# Childhood Ependymoma

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood ependymoma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## Childhood Ependymoma

Ependymoma is a rare type of tumor that starts in the brain or spinal cord. The brain controls all body functions, such as breathing, heart rate, memory and learning, emotion, and senses. The spinal cord is made up of bundles of nerve fibers that carry messages between the brain and the rest of the body. Together, the brain and spinal cord make up the central nervous system (CNS).

Ependymomas start when cells called ependymal cells grow without control. Ependymal cells line the ventricles and passageways in the brain and spinal cord and make cerebrospinal fluid (CSF), which acts as a cushion to protect the brain and spinal cord from injury. Ependymomas can spread when the CSF carries ependymoma cells to other parts of the CNS. Ependymomas rarely spread outside the CNS.

Children and adults can get ependymoma, but it is more common in young children. This type of tumor accounts for about 9% of all childhood brain and spinal cord tumors, affecting about 200 children per year in the United States.

### Types of childhood ependymoma

There are different types of ependymomas depending on where the tumor is located. Three main types of ependymoma are seen in children:

- Posterior fossa (infratentorial) ependymomas form in the lower part of the brain near the middle of the back of the head. In children, most ependymomas arise in this area of the brain and affect the cerebellum and brain stem.
  - The cerebellum is the lower, back part of the brain (near the middle of the back of the head). The cerebellum controls movement, balance, and posture.
  - The brain stem, located in the lowest part of the brain (just above the back of the neck), connects the brain to the spinal cord. The brain stem controls vital functions, such as breathing, heart rate, blood pressure, and the nerves and muscles used in seeing, hearing, walking, talking, and eating.
- Supratentorial ependymomas form at the top of the head and affect the cerebrum. Ependymoma in this area of the brain is less common in children.
  - The cerebrum is the largest part of the brain, at the top of the head. The cerebrum controls thinking, learning, problem-solving, emotions, speech, reading, writing, and voluntary movement.
- Spinal cord ependymomas are rare in children. Most spinal cord ependymomas in children are a type called myxopapillary ependymomas, which usually occur in the lower part of the spine.
  - The spinal cord is the column of nerve tissue that runs from the brain stem down the center of the back. Spinal cord nerves carry messages between the brain and the rest of the body, such as a message from the brain to cause muscles to move or a message from the skin to the brain to feel touch.

Anatomy of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.

Drawing of the inside of the brain showing the lateral ventricle, third ventricle, fourth ventricle, and the passageways between the ventricles (with cerebrospinal fluid shown in blue). Also shown are the cerebrum, cerebellum, brain stem (pons and medulla), and spinal cord.

### Causes and risk factors for childhood ependymoma

Childhood ependymoma is caused by certain changes to the way ependymal cells function, especially how they grow and divide into new cells. The exact cause of these cell changes is unknown. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases the chance of getting a disease. Children with an inherited condition called neurofibromatosis type 2 (NF2) may have an increased risk of developing ependymoma along the optic pathway. Not every child with this risk factor will develop ependymoma. And it will develop in some children who don't have a known risk factor.

### Symptoms of childhood ependymoma

Symptoms of ependymoma depend on the child's age and where the tumor has formed. It's important to check with your child's doctor if your child has any of the symptoms below.

Symptoms of posterior fossa ependymoma in children can include:

- buildup of spinal fluid in the brain that may cause tiredness, vomiting, eyes that stay looking down, irritability, slowed development, or increased size of the head
- loss of balance or trouble walking
- neck pain
- loss of function of the nerves in the back of the brain

Symptoms of supratentorial ependymomas in children can include:

- seizures
- frequent headaches
- blurry vision
- nausea and vomiting
- changes in movement and sensation

Symptoms of spinal cord ependymomas in children can include:

- neck or back pain
- neck weakness or stiffness
- weakness in one or both legs
- trouble urinating
- a change in bowel function

These symptoms may be caused by problems other than an ependymoma. The only way to know is to see your child's doctor.

### Tests to diagnose childhood ependymoma

If your child has symptoms that suggest an ependymoma, their doctor will need to find out if these are due to ependymoma or some other problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam, including a neurologic exam. Depending on these results, they may recommend other tests. If your child is diagnosed with an ependymoma, the results of these tests will help you and your child's doctor plan treatment.

The tests used to diagnose ependymoma in children may include:

#### Magnetic resonance imaging (MRI) with or without gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the brain and spinal cord. A substance called gadolinium is injected into a vein and travels through the bloodstream. The gadolinium may collect around the cancer cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).

Magnetic resonance imaging (MRI) scan. The child lies on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body. The positioning of the child on the table depends on the part of the body being imaged.

Magnetic resonance imaging (MRI) scan; drawing shows a child lying on a table that slides into the MRI machine, which takes a series of detailed pictures of areas inside the body.

#### Biopsy

If the diagnostic tests show there may be a brain tumor, a biopsy can be done by removing part of the skull or making a small hole in the skull and using a needle or surgical device to remove a sample of the brain tissue. Sometimes, when a needle is used, it is guided by a computer to remove the tissue sample. A pathologist views the tissue under a microscope to look for cancer cells and determine the grade of the tumor. If cancer cells are found, the doctor will remove as much tumor as safely possible during the same surgery.

Craniotomy. An opening is made in the skull and a piece of the skull is removed to show part of the brain.

Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.

The following laboratory tests may be done on the tissue that was removed during the biopsy:

- Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient's tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type.
- Next-generation sequencing uses computers to piece together DNA or RNA fragments in order to sequence a person or other organism's entire DNA, large segments of DNA or RNA, or the DNA in specific types of cells from a sample of tissue. Next-generation sequencing can also identify changes in certain areas of the genome or in specific genes. There are many different types of next-generation sequencing methods, including whole-genome sequencing, whole-exome sequencing, multigene panel testing, and transcriptome sequencing. Next-generation sequencing may help researchers understand the cause of certain diseases, such as cancer. Also called massively parallel sequencing and NGS.

The Molecular Characterization Initiative offers free molecular testing to children, adolescents, and young adults with certain types of newly diagnosed cancer. The program is offered through NCI's Childhood Cancer Data Initiative. To learn more, visit About the Molecular Characterization Initiative (https://www.cancer.gov/research/areas/childhood/childhood-cancer-data-initiative/data-ecosystem/molecular-characterization).

#### Lumbar puncture

Lumbar puncture is a procedure used to collect cerebrospinal fluid (CSF) from the spinal column. This is done by placing a needle between two bones in the spine and into the lining around the spinal cord to remove a sample of CSF. The sample of CSF is checked under a microscope for signs of tumor cells. The sample may also be checked for the amounts of protein and glucose.

Lumbar puncture. A patient lies in a curled position on a table. After a small area on the lower back is numbed, a spinal needle (a long, thin needle) is inserted into the lower part of the spinal column to remove cerebrospinal fluid (CSF, shown in blue). The fluid may be sent to a laboratory for testing.

Lumbar puncture; drawing shows a patient lying in a curled position on a table and a spinal needle (a long, thin needle) being inserted into the lower back. Inset shows a close-up of the spinal needle inserted into the cerebrospinal fluid (CSF) in the lower part of the spinal column.

### Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's cancer.

To learn more about choosing a doctor and getting a second opinion, see Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, see Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Stages and tumor grades of childhood ependymoma

Staging is the process of learning the extent of the cancer in the body and is often used to help plan treatment and make a prognosis. There is no staging system used for childhood ependymoma, but it is given a tumor grade. Tumor grading is based on the World Health Organization (WHO) criteria.

Tumor grade describes how abnormal the cancer cells look under a microscope, how quickly the tumor is likely to grow and spread, and how likely the tumor is to come back after treatment. The WHO criteria also classifies ependymomas by their location in the brain or spinal cord (see the section on Types of childhood ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma#_359)) and the tumor's molecular or genetic features.

Low-grade (grade I) cancer cells look more like normal cells than high-grade (grades II and III) cancer cells. Grade I cancer cells also tend to grow and spread more slowly than grade II and III cancer cells.

Childhood ependymoma often comes back after treatment, sometimes as long as 15 years after the initial treatment. The tumor commonly comes back at the original cancer site, although it can also spread to areas near the original site. It is rare for ependymoma to spread to areas far from the original cancer site.

### Types of treatment for childhood ependymoma

#### Who treats children with ependymoma?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for childhood ependymoma. The pediatric oncologist works with other health care providers who are experts in treating children with brain tumors and also specialize in other areas of medicine. Other specialists may include:

- pediatric neurosurgeon
- neurologist
- pediatrician
- radiation oncologist
- pathologist
- pediatric nurse specialist
- social worker
- medical oncologist
- endocrinologist
- rehabilitation specialist
- psychologist
- child-life specialist
- fertility specialist

There are different types of treatment for children and adolescents with ependymoma. You and your child's care team will work together to decide treatment. Many factors will be considered, such as where the cancer is located, your child's age and overall health, and the type and grade of the ependymoma.

Your child's treatment plan will include information about the cancer, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, see our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

The types of treatment your child might have include:

#### Surgery

Surgery to remove the tumor and some of the healthy tissue around it is usually the first treatment for childhood ependymoma. Surgery may be done to obtain a biopsy sample to confirm the diagnosis (see Tests to diagnose childhood ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma#_84)), relieve symptoms caused by the tumor pressing on the brain or spinal cord, and to remove as much of the tumor as possible.

An MRI is often done after the tumor is removed to find out whether any tumor remains. If tumor remains, a second surgery to remove as much of the remaining tumor as possible may be done.

Some children may be given chemotherapy or radiation therapy after surgery to kill any cancer cells that are left. Treatment given after surgery, to lower the risk that the cancer will come back, is called adjuvant therapy.

#### Radiation therapy

Radiation therapy is a cancer treatment that uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing. Ependymoma is treated with external beam radiation therapy. This type of therapy uses a machine outside the body to send radiation toward the area of the body with cancer. Radiation therapy may be given alone or with other treatments, such as chemotherapy.

Certain ways of giving external beam radiation therapy can help keep radiation from damaging nearby healthy tissue. These include:

- Conformal radiation therapy uses a computer to make a 3-dimensional (3-D) picture of the tumor and shapes the radiation beams to fit the tumor.
- Intensity-modulated radiation therapy (IMRT) is a type of 3-D radiation therapy that uses a computer to make pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed at the tumor from many angles.
- Proton-beam radiation therapy is a type of high-energy radiation therapy. A radiation therapy machine aims streams of protons (tiny, invisible, positively-charged particles) at the cancer cells to kill them.
- Stereotactic radiosurgery uses a rigid head frame attached to the skull to keep the head still during the radiation treatment. A machine aims a single large dose of radiation directly at the tumor. This procedure does not involve surgery. It is also called stereotaxic radiosurgery, radiosurgery, and radiation surgery.

Younger children who receive radiation therapy to the brain have a higher risk of problems with growth and development than older children. 3-D conformal radiation therapy and proton-beam therapy are being studied in young children to see if it decreases the effects of radiation on growth and development.

Learn more about External Beam Radiation Therapy for Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/external-beam) and Radiation Therapy Side Effects (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/side-effects).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells. Chemotherapy either kills the cancer cells or stops them from dividing. Chemotherapy may be given alone or with other types of treatment, such as radiation therapy.

For ependymoma, chemotherapy is injected into a vein. When given this way, the drugs enter the bloodstream to reach cancer cells throughout the body. Chemotherapy that may be used alone or in combination includes:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- cyclophosphamide (https://www.cancer.gov/about-cancer/treatment/drugs/cyclophosphamide)
- etoposide (https://www.cancer.gov/about-cancer/treatment/drugs/etoposide)
- lomustine (https://www.cancer.gov/about-cancer/treatment/drugs/lomustine)
- vincristine (https://www.cancer.gov/about-cancer/treatment/drugs/vincristinesulfate)

Other chemotherapy drugs not listed here may also be used.

Learn more at Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

#### Clinical trials

A treatment clinical trial is a research study meant to help improve current treatments or obtain information on new treatments for people with cancer. Because cancer in children is rare, taking part in a clinical trial should be considered.

Find clinical trials for people with ependymoma at Ependymoma Clinical Trials (https://www.cancer.gov/research/participate/clinical-trials/disease/ependymoma), or use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. Some clinical trials are open only to patients who have not started treatment. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of childhood ependymoma in the brain or brain stem

Treatment of newly diagnosed childhood ependymoma in the brain or brain stem includes surgery.

After surgery, the plan for further treatment depends on:

- the ependymoma subtype
- whether any cancer cells remain after surgery
- whether the cancer has spread to other parts of the brain or spinal cord
- your child's age

When the tumor is completely removed and cancer cells have not spread, treatment may include radiation therapy.

When part of the tumor remains after surgery, but cancer cells have not spread, treatment may include:

- a second surgery to remove as much of the remaining tumor as possible
- radiation therapy
- chemotherapy before radiation therapy

When cancer cells have spread within the brain and spinal cord, treatment may include:

- radiation therapy to the brain and spinal cord
- chemotherapy

Treatment for children younger than 1 year of age may include:

- chemotherapy
- a clinical trial of 3-dimensional (3-D) conformal radiation therapy or proton-beam radiation therapy

Radiation therapy is not given to children until they are older than 1 year.

To learn more about these treatments, see Types of treatment for childhood ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma#_96).

### Treatment of childhood spinal cord ependymoma

Treatment of newly diagnosed childhood myxopapillary spinal ependymoma (grade 2) is surgery. Sometimes radiation therapy is given after surgery.

Treatment of newly diagnosed childhood nonmyxopapillary spinal ependymoma is surgery. Sometimes radiation therapy is given after surgery for children with grade 2 or grade 3 tumors.

To learn more about these treatments, see Types of treatment for childhood ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma#_96).

### Treatment of recurrent childhood ependymoma

Treatment of recurrent childhood ependymoma may include:

- surgery
- external beam radiation therapy
- chemotherapy

To learn more about these treatments, see Types of treatment for childhood ependymoma (https://www.cancer.gov/types/brain/patient/childhood-ependymoma#_96).

### Prognostic factors for childhood ependymoma

If your child has been diagnosed with ependymoma, you likely have questions about how serious the cancer is and your child's chances of survival. The likely outcome or course of a disease is called prognosis. Your child's prognosis depends on many factors, including:

- where the tumor has formed in the central nervous system (CNS)
- whether there are certain changes in the genes or chromosomes of the cancer cells
- whether the cancer was completely removed by surgery; the prognosis is better if the cancer can be completely removed
- the type and grade of ependymoma
- your child's age when the tumor was diagnosed
- whether the cancer has spread to other parts of the brain or spinal cord; the prognosis is better if the cancer has not spread
- whether the tumor has just been diagnosed or has come back

Prognosis also depends on whether radiation therapy was given, the type and treatment dose, and whether chemotherapy alone was given.

No two people are alike, and responses to treatment can vary greatly. Your child's cancer care team is in the best position to talk with you about your child's prognosis.

### Side effects and late effects of cancer treatment

Cancer treatments can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child’s treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from cancer treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of treatment for childhood ependymoma may include:

- physical problems, including problems with:
  - tooth development
  - hearing function
  - bone and muscle growth and development
  - thyroid function
  - blood clots and broken vessels in the brain, leading to stroke
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer), such as thyroid cancer or brain cancer

Some late effects may be treated or controlled. It is important to talk with your child's doctors about the effects cancer treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

### Follow-up care

As your child goes through treatment, they will have follow-up tests or check-ups. Some of the tests that were done to diagnose the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Childhood ependymoma may come back as long as 15 years or more after initial treatment. So once your child finishes treatment, they will continue to have certain tests from time to time. The results of these tests can show if your child's condition has changed or if the cancer has come back.

Your child may receive an MRI of the brain and spinal cord at the following intervals:

- every 3 to 4 months for the first 2 to 3 years
- every 6 months at 4 to 5 years after treatment
- once a year at more than 5 years after treatment

### Coping with your child's cancer

When a child has cancer, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child's treatment team and to people in your family and community for support. To learn more, see Support for Families: Childhood Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

### Related resources

For more childhood cancer information and other general cancer resources, see:

- Pediatric Brain Tumor Consortium (PBTC) (https://www.pbtc.org/)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors and Caregivers (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)